# Rare Cancers of Childhood Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of rare cancers of childhood. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Rare Cancers of Childhood

### Introduction

Cancer in children and adolescents is rare, although the overall incidence has slowly increased since 1975.[1] Children and adolescents with cancer should be referred to medical centers that have a multidisciplinary team of cancer specialists with experience treating the cancers that occur during childhood and adolescence. This multidisciplinary team approach incorporates the skills of primary care physicians, pediatric surgeons, pathologists, pediatric radiation oncologists, pediatric medical oncologists and hematologists, rehabilitation specialists, pediatric oncology nurses, social workers, child-life professionals, psychologists, nutritionists, and others to ensure that children receive treatment, supportive care, and rehabilitation to achieve optimal survival and quality of life. For specific information about supportive care for children and adolescents with cancer, see the summaries on Supportive and Palliative Care (https://www.cancer.gov/publications/pdq/information-summaries/supportive-care).

The American Academy of Pediatrics has outlined guidelines for pediatric cancer centers and their role in the treatment of children and adolescents with cancer.[2] At these centers, clinical trials are available for most types of cancer that occur in children and adolescents, and the opportunity to participate is offered to most patients and their families. Clinical trials for children and adolescents diagnosed with cancer are generally designed to compare potentially better therapy with current standard therapy. Other types of clinical trials test novel therapies when there is no standard therapy for a cancer diagnosis. Most of the progress in identifying curative therapies for childhood cancers has been achieved through clinical trials. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

Dramatic improvements in survival have been achieved for children and adolescents with cancer. Between 1975 and 2020, childhood cancer mortality decreased by more than 50%.[3-5] Childhood and adolescent cancer survivors require close monitoring because side effects of cancer therapy may persist or develop months or years after treatment. For information about the incidence, type, and monitoring of late effects in childhood and adolescent cancer survivors, see Late Effects of Treatment for Childhood Cancer.

Childhood cancer is a rare disease, with about 15,000 cases diagnosed annually in the United States in individuals younger than 20 years.[6] The U.S. Rare Diseases Act of 2002 (https://www.congress.gov/107/plaws/publ280/PLAW-107publ280.pdf) defines a rare disease as one that affects populations smaller than 200,000 people. Therefore, all pediatric cancers are considered rare.

The designation of a rare tumor is not uniform among pediatric and adult groups. In adults, rare cancers are defined as those with an annual incidence of fewer than six cases per 100,000 people. They account for up to 24% of all cancers diagnosed in the European Union and about 20% of all cancers diagnosed in the United States.[7,8] In children and adolescents, the designation of a rare tumor is not uniform among international groups, as follows:

- A consensus effort between the European Union Joint Action on Rare Cancers and the European Cooperative Study Group for Rare Pediatric Cancers (EXPeRT) estimated that 11% of all cancers in patients younger than 20 years could be categorized as very rare. This consensus group defined very rare cancers as those with annual incidences of fewer than 2 cases per 1 million people. However, three additional histologies (thyroid carcinoma, melanoma, and testicular cancer) with incidences of more than 2 cases per 1 million people were also included in the very rare group due to a lack of knowledge and expertise in the management of these tumors.[9]
- The Children's Oncology Group (COG) defines rare pediatric cancers as those listed in the International Classification of Childhood Cancer subgroup XI, which includes thyroid cancers, melanomas and nonmelanoma skin cancers, and multiple types of carcinomas (e.g., adrenocortical carcinomas, nasopharyngeal carcinomas, and most adult-type carcinomas such as breast cancers and colorectal cancers).[10] These diagnoses account for about 5% of the cancers diagnosed in children aged 0 to 14 years and about 27% of the cancers diagnosed in adolescents aged 15 to 19 years.[4]
  Most cancers in subgroup XI are either melanomas or thyroid cancers, with other cancer types accounting for only 2% of the cancers in children aged 0 to 14 years and 9.3% of the cancers in adolescents aged 15 to 19 years.

These rare cancers are extremely challenging to study because of the relatively few patients with any individual diagnosis, the predominance of rare cancers in the adolescent population, and the small number of clinical trials for adolescents with rare cancers.

Some investigators have used large databases, such as the Surveillance, Epidemiology, and End Results (SEER) Program and the National Cancer Database, to gain more insight into these rare childhood cancers. However, these database studies are limited. Several initiatives to study rare pediatric cancers have been developed by the COG and other international groups, including the Société Internationale D'Oncologie Pédiatrique (SIOP). The Gesellschaft für Pädiatrische Onkologie und Hämatologie (GPOH) rare tumor project was founded in Germany in 2006.[11] The Italian Tumori Rari in Eta Pediatrica (TREP) group was launched in 2000,[12] and the Polish Pediatric Rare Tumor Study Group was launched in 2002.[13] In Europe, the rare tumor study groups from France, Germany, Italy, Poland, and the United Kingdom joined to become the EXPeRT group, focusing on international collaboration and analyses of specific rare tumor entities.[14] Within the COG, efforts have concentrated on increasing accrual to COG registries (Project Every Child) and tumor banking protocols, developing single-arm clinical trials, and increasing cooperation with adult cooperative group trials.[15] The accomplishments and challenges of this initiative have been described in detail.[10,16]

The tumors listed in this summary are very diverse. They are arranged in descending anatomic order, from infrequent tumors of the head and neck to rare tumors of the urogenital tract and skin. All of these cancers are rare enough that pediatric hospitals might see less than a handful of some histologies in several years. Most of the histologies listed here occur more frequently in adults. Information about these tumors may also be found in sources relevant to adults with cancer.

The Rare Cancers of Childhood Treatment summary has been separated into individual summaries for each topic. Please use the lists below or the following link to find the individual summaries: PDQ Cancer Information Summaries: Pediatric Treatment (https://www.cancer.gov/publications/pdq/information-summaries/pediatric-treatment).

### References

Smith MA, Seibel NL, Altekruse SF, et al.: Outcomes for children and adolescents with cancer: challenges for the twenty-first century. J Clin Oncol 28 (15): 2625-34, 2010.20404250
American Academy of Pediatrics: Standards for pediatric cancer centers. Pediatrics 134 (2): 410-4, 2014. Also available online (https://pediatrics.aappublications.org/content/134/2/410). Last accessed February 25, 2025.
Smith MA, Altekruse SF, Adamson PC, et al.: Declining childhood and adolescent cancer mortality. Cancer 120 (16): 2497-506, 2014.24853691
National Cancer Institute: NCCR*Explorer: An interactive website for NCCR cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://NCCRExplorer.ccdi.cancer.gov/). Last accessed February 25, 2025.
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
Ward E, DeSantis C, Robbins A, et al.: Childhood and adolescent cancer statistics, 2014. CA Cancer J Clin 64 (2): 83-103, 2014 Mar-Apr.24488779
Gatta G, Capocaccia R, Botta L, et al.: Burden and centralised treatment in Europe of rare tumours: results of RARECAREnet-a population-based study. Lancet Oncol 18 (8): 1022-1039, 2017.28687376
DeSantis CE, Kramer JL, Jemal A: The burden of rare cancers in the United States. CA Cancer J Clin 67 (4): 261-272, 2017.28542893
Ferrari A, Brecht IB, Gatta G, et al.: Defining and listing very rare cancers of paediatric age: consensus of the Joint Action on Rare Cancers in cooperation with the European Cooperative Study Group for Pediatric Rare Tumors. Eur J Cancer 110: 120-126, 2019.30785015
Pappo AS, Krailo M, Chen Z, et al.: Infrequent tumor initiative of the Children's Oncology Group: initial lessons learned and their impact on future plans. J Clin Oncol 28 (33): 5011-6, 2010.20956621
Brecht IB, Graf N, Schweinitz D, et al.: Networking for children and adolescents with very rare tumors: foundation of the GPOH Pediatric Rare Tumor Group. Klin Padiatr 221 (3): 181-5, 2009 May-Jun.19437371
Ferrari A, Bisogno G, De Salvo GL, et al.: The challenge of very rare tumours in childhood: the Italian TREP project. Eur J Cancer 43 (4): 654-9, 2007.17049226
Balcerska A, Godziński J, Bień E, et al.: [Rare tumours--are they really rare in the Polish children population?]. Przegl Lek 61 (Suppl 2): 57-61, 2004.15686048
Bisogno G, Ferrari A, Bien E, et al.: Rare cancers in children - The EXPeRT Initiative: a report from the European Cooperative Study Group on Pediatric Rare Tumors. Klin Padiatr 224 (6): 416-20, 2012.23143769
Musselman JR, Spector LG, Krailo MD, et al.: The Children's Oncology Group Childhood Cancer Research Network (CCRN): case catchment in the United States. Cancer 120 (19): 3007-15, 2014.24889136
Pappo AS, Furman WL, Schultz KA, et al.: Rare Tumors in Children: Progress Through Collaboration. J Clin Oncol 33 (27): 3047-54, 2015.26304909

## Head and Neck Cancers

These cancers are seen very infrequently in patients younger than 15 years, and most of the evidence is derived from small case series or cohorts combining pediatric and adult patients.

Childhood sarcomas often occur in the head and neck area and they are described in other summaries. Rare pediatric head and neck cancers include the following:

### Nasopharyngeal Carcinoma

For more information, see Childhood Nasopharyngeal Cancer Treatment.

### Esthesioneuroblastoma

For more information, see Childhood Esthesioneuroblastoma Treatment.

### Thyroid Tumors

For more information, see Childhood Thyroid Cancer Treatment.

### Oral Cavity Cancer

For more information, see Childhood Oral Cavity Cancer Treatment.

### Salivary Gland Tumors

For more information, see Childhood Salivary Gland Tumors Treatment.

### Laryngeal Cancer and Papillomatosis

For more information, see Childhood Laryngeal Tumors Treatment.

### NUT Carcinoma

For more information, see Childhood NUT Carcinoma Treatment.

## Thoracic Cancers

The prognosis, diagnosis, classification, and treatment of pediatric thoracic cancers are discussed below. These cancers are seen very infrequently in patients younger than 15 years, and most of the evidence is derived from case series.

Rare pediatric thoracic cancers include the following:

### Breast Cancer

For more information, see Childhood Breast Tumors Treatment.

### Lung Cancer

Most pulmonary malignant neoplasms in children result from metastatic disease. The approximate ratio of primary malignant tumors to metastatic disease is 1:5.[1]

The most common malignant primary tumors of the lung include the following:

- Pulmonary inflammatory myofibroblastic tumors.
- Tracheobronchial tumors.
- Pleuropulmonary blastoma.

#### Pulmonary Inflammatory Myofibroblastic Tumors

For more information, see Childhood Pulmonary Inflammatory Myofibroblastic Tumors Treatment.

#### Tracheobronchial Tumors

For more information, see Childhood Tracheobronchial Tumors Treatment.

#### Pleuropulmonary Blastoma

For more information, see Childhood Pleuropulmonary Blastoma Treatment.

### Esophageal Cancer

For more information, see Childhood Esophageal Cancer Treatment.

### Thymoma and Thymic Carcinoma

For more information, see Childhood Thymoma and Thymic Carcinoma Treatment.

### Cardiac Tumors

For more information, see Childhood Cardiac Tumors Treatment.

### References

Weldon CB, Shamberger RC: Pediatric pulmonary tumors: primary and metastatic. Semin Pediatr Surg 17 (1): 17-29, 2008.18158138

## Abdominal Cancers

The prognosis, diagnosis, classification, and treatment of pediatric abdominal cancers are discussed below. These cancers are seen very infrequently in patients younger than 15 years, and most of the evidence is derived from case series. For information about kidney tumors, see Wilms Tumor and Other Childhood Kidney Tumors Treatment.

Rare pediatric abdominal cancers include the following:

### Adrenocortical Carcinoma

For more information, see Childhood Adrenocortical Carcinoma Treatment.

### Gastric Cancer

For more information, see Pediatric Gastric Cancer Treatment.

### Pancreatic Cancer

For more information, see Childhood Pancreatic Cancer Treatment.

### Colorectal Cancer

For more information, see Childhood Colorectal Cancer Treatment.

### Gastrointestinal Neuroendocrine Tumors

For more information, see Pediatric Gastrointestinal Neuroendocrine Tumors Treatment.

### Gastrointestinal Stromal Tumors (GIST)

For more information, see Childhood Gastrointestinal Stromal Tumors Treatment.

## Genital/Urinary Tumors

The prognosis, diagnosis, classification, and treatment of pediatric genital/urinary tumors are discussed below. These tumors are seen very infrequently in patients younger than 15 years, and most of the evidence is derived from case series.

Rare pediatric genital/urinary tumors include the following:

### Bladder Cancer

For more information, see Childhood Bladder Cancer Treatment.

### Testicular Cancer (Non–Germ Cell)

For more information, see Childhood Testicular Cancer Treatment.

### Ovarian Cancer (Non–Germ Cell)

For more information, see Childhood Ovarian Cancer Treatment.

### Cervical and Vaginal Cancer

For more information, see Childhood Cervical and Vaginal Cancer Treatment.

## Other Rare Childhood Cancers

The prognosis, diagnosis, classification, and treatment of other rare childhood cancers are discussed below. These cancers are seen very infrequently in patients younger than 15 years, and most of the evidence is derived from case series.

Other rare childhood cancers include the following:

### Mesothelioma

For more information, see Childhood Mesothelioma Treatment.

### Multiple Endocrine Neoplasia (MEN) Syndromes

For more information, see Childhood Multiple Endocrine Neoplasia (MEN) Syndromes Treatment.

### Pheochromocytoma and Paraganglioma

For more information, see Childhood Pheochromocytoma and Paraganglioma Treatment.

### Skin Cancer (Melanoma, Basal Cell Carcinoma [BCC], and Squamous Cell Carcinoma [SCC])

For more information about specific genetic variants and related hereditary skin cancer syndromes, see Genetics of Skin Cancer. For information about uveal melanoma in children, see Childhood Intraocular (Uveal) Melanoma Treatment.

#### Melanoma

For more information, see Childhood Melanoma Treatment.

#### BCC and SCC

For more information, see Childhood Basal Cell Carcinoma and Squamous Cell Carcinoma of the Skin Treatment.

### Intraocular (Uveal) Melanoma

For more information, see Childhood Intraocular (Uveal) Melanoma Treatment.

### Chordoma

For more information, see Childhood Chordoma Treatment.

### Cancer of Unknown Primary (CUP) Site

For more information, see Childhood Cancer of Unknown Primary (CUP) Treatment.

## Latest Updates to This Summary (09/27/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

This summary was comprehensively reviewed.

This summary is written and maintained by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of rare cancers of childhood. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Rare Cancers of Childhood Treatment are:

- Denise Adams, MD (Children's Hospital Boston)
- Sally J. Cohen-Cutler, MD, MS (Children's Hospital of Philadelphia)
- Karen J. Marcus, MD, FACR (Dana-Farber of Boston Children's Cancer Center and Blood Disorders Harvard Medical School)
- William H. Meyer, MD
- Paul A. Meyers, MD (Memorial Sloan-Kettering Cancer Center)
- Thomas A. Olson, MD (Aflac Cancer and Blood Disorders Center of Children's Healthcare of Atlanta - Egleston Campus)
- Alberto S. Pappo, MD (St. Jude Children's Research Hospital)
- D. Williams Parsons, MD, PhD (Texas Children's Hospital)
- Arthur Kim Ritchey, MD (Children's Hospital of Pittsburgh of UPMC)
- Carlos Rodriguez-Galindo, MD (St. Jude Children's Research Hospital)
- Stephen J. Shochat, MD (St. Jude Children's Research Hospital)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Pediatric Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Rare Cancers of Childhood Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/childhood-cancers/hp/rare-childhood-cancers-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389315]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).